# Anal Cancer Prevention (PDQ®)

Patient Version

This PDQ cancer information summary has current information about anal cancer prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## What Is Prevention?

Cancer prevention is action taken to lower the chance of getting cancer. By preventing cancer, the number of new cases of cancer in a group or population is lowered. Hopefully, this will lower the number of deaths caused by cancer.

To prevent new cancers from starting, scientists look at risk factors and protective factors. Anything that increases your chance of developing cancer is called a cancer risk factor; anything that decreases your chance of developing cancer is called a cancer protective factor.

Some risk factors for cancer can be avoided, but many cannot. For example, both smoking and inheriting certain genes are risk factors for some types of cancer, but only smoking can be avoided. Regular exercise and a healthy diet may be protective factors for some types of cancer. Avoiding risk factors and increasing protective factors may lower your risk, but it does not mean that you will not get cancer.

Different ways to prevent cancer are being studied, including:

- Changing lifestyle or eating habits.
- Avoiding things known to cause cancer.
- Taking medicines to treat a precancerous condition or to keep cancer from starting.

## General Information About Anal Cancer

Key Points for This Section
- Anal cancer is a disease in which malignant (cancer) cells form in the tissues of the anus.
- Squamous cell carcinoma is the most common type of anal cancer.
- In the United States, the number of new cases of anal cancer has increased in recent years.

### Anal cancer is a disease in which malignant (cancer) cells form in the tissues of the anus.

The anus is the end of the large intestine, below the rectum. It is where stool (solid waste) leaves the body. The anus is formed partly from the outer skin layers of the body and partly from the intestine. The anus is connected to the rectum by the anal canal, which is about 1–1½ inches long. This area is controlled by two ring-like sphincter muscles, which open and close to let stool pass out of the body.

Anatomy of the lower gastrointestinal (digestive) system showing the colon, rectum, and anus. Other organs that make up the digestive system are also shown.

Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, colon, small intestine, rectum, and anus.

The skin around the outside of the anus is called the perianal area. Tumors in this area are skin tumors, not anal cancer.

To learn more about anal cancer, visit Anal Cancer Treatment.

### Squamous cell carcinoma is the most common type of anal cancer.

In the United States, squamous cell carcinoma is the most common type of anal cancer. Studies show that human papillomavirus (HPV) infection is the main cause of this type of anal cancer.

Another type of anal cancer, called anal adenocarcinoma, is very rare and is not discussed in this summary.

### In the United States, the number of new cases of anal cancer has increased in recent years.

Between 2012 and 2021, the number of new cases of anal cancer increased each year. Between 2013 and 2022, the rate of deaths from this disease also increased each year.

## Anal Cancer Prevention

Key Points for This Section
- Avoiding risk factors and increasing protective factors may help prevent cancer.
- The following are risk factors for anal cancer:
  - Anal HPV infection
  - Certain medical conditions
  - Certain sexual practices
  - Cigarette smoking
- The following protective factors decrease the risk of anal cancer:
  - HPV vaccination
  - Screening for anal cancer using anoscopy
  - Treatment of anal lesions
- It is not clear if the following protective factor decreases the risk of anal cancer:
- Cancer prevention clinical trials are used to study ways to prevent cancer.
- New ways to prevent anal cancer are being studied in clinical trials.

### Avoiding risk factors and increasing protective factors may help prevent cancer.

Avoiding cancer risk factors may help prevent certain cancers. Risk factors include smoking, having overweight, and not getting enough exercise. Increasing protective factors such as quitting smoking and exercising may also help prevent some cancers. Talk to your doctor or other health care professional about how you might lower your risk of cancer.

### The following are risk factors for anal cancer:

#### Anal HPV infection

Being infected with human papillomavirus (HPV) is the main risk factor for anal cancer. Being infected with HPV can lead to squamous cell carcinoma of the anus, which is the most common type of anal cancer. About nine out of every ten cases of anal cancer are found in patients with anal HPV infection.

People with healthy immune systems are usually able to fight HPV infections. People with weakened immune systems who are infected with HPV have a higher risk of anal cancer.

#### Certain medical conditions

##### History of cervical, vaginal, or vulvar cancer

Cervical cancer, vaginal cancer, and vulvar cancer are related to HPV infection. Women who have had cervical, vaginal, or vulvar cancer have a higher risk of anal cancer.

##### HIV infection/AIDS

Being infected with HIV is a strong risk factor for anal cancer. HIV is the cause of AIDS. HIV weakens the body's immune system and its ability to fight infection. HPV infection of the anus is common among people who are HIV positive.

The risk of anal cancer is higher in men who are HIV positive and have sex with men compared with men who are HIV negative and have sex with men. Women who are HIV positive also have an increased risk of anal cancer compared with women who are HIV negative.

Studies show that intravenous drug use or cigarette smoking may further increase the risk of anal cancer in people who are HIV positive.

##### Immunosuppression

Immunosuppression is a condition that weakens the body's immune system and its ability to fight infections and other diseases. Chronic (long-term) immunosuppression may increase the risk of anal cancer because it lowers the body's ability to fight HPV infection.

People who have an organ transplant and receive immunosuppressive medicine to prevent organ rejection have an increased risk of anal cancer.

Having an autoimmune disorder, such as Crohn disease or psoriasis, may increase the risk of anal cancer. It is not clear if the increased risk is due to the autoimmune condition, the treatment for the condition, or a combination of both.

#### Certain sexual practices

The following sexual practices increase the risk of anal cancer because they increase the chance of being infected with HPV:

- Having receptive anal intercourse (anal sex).
- Having many sexual partners.
- Sex between men.

Men and women who have a history of anal warts or other sexually transmitted diseases also have an increased risk of anal cancer.

#### Cigarette smoking

Studies show that cigarette smoking increases the risk of anal cancer. Studies also show that current smokers have a higher risk of anal cancer than smokers who have quit or people who have never smoked.

### The following protective factors decrease the risk of anal cancer:

#### HPV vaccination

HPV vaccines help protect the body against infection with certain types of HPV. They are used to prevent anal cancer, cervical cancer, vulvar cancer, vaginal cancer, and some other types of cancer caused by HPV. They are also used to prevent abnormal lesions caused by HPV that may lead to some of these cancers.

Studies show that being vaccinated against HPV lowers the risk of anal cancer. The vaccine may work best when it is given before a person is exposed to HPV.

#### Screening for anal cancer using anoscopy

Cancer screening is looking for cancer before a person has any symptoms. This can help find cancer at an early stage. When abnormal tissue or cancer is found early, it may be easier to treat.

An anoscopy is a procedure that uses a short, lighted tube called an anoscope to check for abnormal areas in the anus and lower rectum.

Studies suggest that using anoscopy to screen for anal cancer could reduce the number of deaths from the disease in people who are HIV positive.

#### Treatment of anal lesions

Studies show that treatment of anal high-grade squamous intraepithelial lesions (HSIL) decreases the development of anal cancer in people who are HIV positive.

### It is not clear if the following protective factor decreases the risk of anal cancer:

#### Condom use

It is not known if the use of condoms protects against anal HPV infection. This is because not enough studies have been done to prove this.

### Cancer prevention clinical trials are used to study ways to prevent cancer.

Cancer prevention clinical trials are used to study ways to lower the risk of developing certain types of cancer. Some cancer prevention trials include healthy people who may or may not have an increased risk of cancer. Other prevention trials include people who have had cancer and are trying to prevent recurrence or a second cancer.

The purpose of some cancer prevention clinical trials is to find out whether actions people take can prevent cancer. These may include eating fruits and vegetables, exercising, quitting smoking, or taking certain medicines, vitamins, minerals, or food supplements.

### New ways to prevent anal cancer are being studied in clinical trials.

Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about anal cancer prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Anal Cancer Prevention. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/anal/patient/anal-prevention-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389512]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).